# Communication in Cancer Care (PDQ®)

Patient Version

This PDQ cancer information summary has current information about communicating with the cancer patient and his or her family. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

Key Points for This Section
- Good communication between people with cancer, their family, and the health care team is important in cancer care.
- Families may experience communication challenges.

### Good communication between people with cancer, their family, and the health care team is important in cancer care.

Good communication with your family and the health care team has a positive effect on your cancer journey.

The goals of good communication in cancer care are to:

- Build a trusting relationship with your health care team.
- Learn from your health care team about your cancer diagnosis.
- Discuss your options for treatment and care throughout your cancer journey.
- Improve your well-being and quality of life.

You will face many decisions when you are diagnosed with cancer. Tell your health care team about concerns you have during treatment, and if you have problems coping with the cancer diagnosis.

Studies show that there are many positive results when people with cancer and their doctors communicate well during cancer care. Positive results include:

- More likely to be content with care.
- More likely to follow through with treatment.
- Better quality of life.
- Reduced anxiety and other symptoms.
- More likely to take part in a clinical trial.
- Improved knowledge of the disease and prognosis.
- Preferred care is received at end of life.

Ask for help from a patient navigator. A patient navigator can guide you through the health care system and help you communicate with your health care team, so you get the information you need to make decisions about your care.

### Families may experience communication challenges.

You will go through different emotions when you have cancer. You may want to hide feelings of distress and sadness and act normal to protect your family and friends. This is also often true for friends and family. Talking about cancer-related issues may help reduce stress for you and your family. Family-focused psychotherapy may also benefit you and your family.

## Factors in Communication

Key Points for This Section
- Tell your health care team how you want to receive information about your cancer and treatment.
- There are ways to improve communication with your doctors.
- Culture can also affect communication.

### Tell your health care team how you want to receive information about your cancer and treatment.

You may want written instructions and phone calls, or you may prefer texts and emails. Let your health care team know how you want to receive your information about your cancer and cancer treatment.

### There are ways to improve communication with your doctors.

It may be hard to remember what your doctor said and what you want to ask at each appointment. Make a list of the questions you want to ask before your visit. The following suggestions may help you remember what was said:

- Have a family member go with you when you meet with your doctor.
- Ask for a copy of the information so you can read it after your visit.
- Record the discussion.

Ask if your doctor or clinic offers any of the following:

- A packet that includes items such as a question idea sheet, booklets on decision-making and patient rights, and information about the clinic.
- A psychologist you can talk to about how you are feeling.

### Culture can also affect communication.

Some cultures place a greater emphasis on communication with the family as a whole unit, while other cultures focus more on the patient's ability to make their own decisions. Tell your health care team how much information you want to receive.

Your religious beliefs may be a source of strength and coping for you. Tell your health care team about any spiritual and religious needs and concerns you want them to know about. For more information, see Spirituality in Cancer Care.

## Communication in Pediatric Cancer Care

Key Points for This Section
- Many parents want to know their child's prognosis.
- Children with cancer want to know about their illness and how it will be treated.
- Children may wish to know what is going on when someone they love has cancer.

### Many parents want to know their child's prognosis.

When your child has cancer, you will likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. Ask your child's cancer care team about your child's prognosis. Knowing this information can help you and your loved ones make decisions. No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Children with cancer want to know about their illness and how it will be treated.

The amount of information a child may want to know depends in part on their age. Most children worry about how their illness and treatment will affect their daily lives and the people around them. Studies also show that children have less doubt and fear when they are given information they can understand about their illness, even if it is bad news.

### Children may wish to know what is going on when someone they love has cancer.

When a parent has cancer, the child may have high levels of distress. Children may also experience anxiety and distress when they see a sibling going through cancer therapy or dying. Children do better when family members or the health care team talk with them about what to expect and answer their questions. For ways to help teens cope and communicate when a loved one has cancer, see Support for Teens When a Family Member Has Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/teens).

## Electronic Communication in Cancer Care

Key Points for This Section
- Your health care team may reach out to you using electronic methods.

### Your health care team may reach out to you using electronic methods.

A method to get health information that is used frequently in medicine is eHealth. eHealth refers to the use of digital technology, such as home computers, smart phones, and the Internet to find and send health information. eHealth helps:

- Send information between patients, family members, and the health care team.
- Improve shared decision making.
- Improve how patients explain their concerns to the health care team.
- Give social support to patients.
- Provide clinical trial information.

## Communication at End of Life

Key Points for This Section
- Early communication about end-of-life decisions is important.
- Early conversations with your doctors can help you feel prepared for end-of-life decisions.
- Talk with your doctor about your prognosis and treatment options.

### Early communication about end-of-life decisions is important.

When you learn you have terminal cancer, you're faced with decisions that will affect your end-of-life care. Talk about these decisions early to make it easier on you and your family later. The following are some questions to consider:

- What's important to me at the end of life?
- Is it most important that I be as comfortable and alert as possible during the last stages of cancer?
- Is it most important to continue with treatments that may help me live longer but are painful?

When you and your family decide it is time to move from active treatment to end-of-life care, your goals and desires are important. It may be difficult to start the discussion about end-of-life care with your doctor, but it is important to make these decisions early in your cancer journey.

### Early conversations with your doctors can help you feel prepared for end-of-life decisions.

Many people with terminal cancer who start talking with their doctors early about end-of-life issues report feeling better prepared. Early communication with your doctors may make it easier to deal with concerns about being older, living alone, symptom control, spiritual well-being, and how your family will cope in the future.

Ask your doctor or clinic about an end-of-life consultation, which includes a list of questions that can help you explain your wishes for the end of life.

### Talk with your doctor about your prognosis and treatment options.

It is important to understand your prognosis when you make decisions about your care and treatment if you have terminal cancer. You may want to know how long you have to live. It can be different for each person and depends on the type of cancer, where it has spread, and whether you have other illnesses. Some people want more information on their prognosis than others.

Your doctor can talk about treatment options with you and your family and explain the effects they may have on your cancer and your quality of life. Make sure you understand your options and ask questions if you need more information. People who discuss end-of-life choices with their doctors are more likely to receive the care they want.

## Learn More About Communicating When a Family Member Has Cancer

For more information from the National Cancer Institute about communication in cancer care, see the following:

- When Someone You Love is Being Treated for Cancer: Support for Caregivers (https://www.cancer.gov/publications/patient-education/when-someone-you-love-is-being-treated)
- Children with Cancer: A Guide For Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents)
- Advanced Cancer and Caregivers (https://www.cancer.gov/about-cancer/advanced-cancer/caregivers)
- When Your Parent Has Cancer: A Guide for Teens (https://www.cancer.gov/publications/patient-education/when-your-parent-has-cancer)
- When Your Brother or Sister Has Cancer: A Guide for Teens (https://www.cancer.gov/publications/patient-education/sibling-has-cancer)

## Current Clinical Trials

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about communicating with the cancer patient and his or her family. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Communication in Cancer Care. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/coping/adjusting-to-cancer/communication-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389345]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).